# Gastrointestinal Neuroendocrine Tumors Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of adult gastrointestinal neuroendocrine tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Gastrointestinal Neuroendocrine Tumors

Key Points for This Section
- A gastrointestinal neuroendocrine tumor is cancer that forms in the lining of the gastrointestinal tract.
- Health history can affect the risk of GI neuroendocrine tumors.
- Some GI neuroendocrine tumors have no signs or symptoms in the early stages.
- Carcinoid syndrome may occur if the tumor spreads to the liver or other parts of the body.
- Imaging studies and tests that examine the blood and urine are used to diagnose GI neuroendocrine tumors.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### A gastrointestinal neuroendocrine tumor is cancer that forms in the lining of the gastrointestinal tract.

The gastrointestinal (GI) tract is part of the body's digestive system, a series of hollow, muscular organs joined in a long, twisting tube from the mouth to the anus. The digestive tract processes nutrients in foods that are eaten and helps pass waste material out of the body:

- Food moves from the throat to the stomach through a tube called the esophagus.
- After food enters the stomach, it is broken down by stomach muscles that mix the food and liquid with digestive juices.
- After leaving the stomach, partly digested food passes into the small intestine and then into the large intestine.
- The end of the large intestine, called the rectum, stores the waste from the digested food until it is pushed out of the anus during a bowel movement.

Gastrointestinal neuroendocrine tumors form in the lining of the gastrointestinal tract, most often in the small intestine, appendix, or rectum.

Drawing of the gastrointestinal tract showing the stomach, small intestine (including the duodenum, jejunum, and ileum), appendix, colon, and rectum.

Gastrointestinal (GI) neuroendocrine tumors (also called gastrointestinal carcinoid tumors) form from a certain type of neuroendocrine cell (a type of cell that is like a nerve cell and a hormone-making cell). These cells are scattered throughout the chest and abdomen but most are found in the GI tract. Neuroendocrine cells make hormones that help control digestive juices and the muscles used in moving food through the stomach and intestines. A GI neuroendocrine tumor may also make hormones and release them into the body.

GI neuroendocrine tumors are rare and most grow very slowly. Most of them occur in the small intestine, rectum, and appendix. Sometimes more than one tumor will form.

See the following for information about other types of neuroendocrine tumors:

- Pancreatic Neuroendocrine Tumors (Islet Cell Tumors) Treatment
- Childhood Gastrointestinal Neuroendocrine Tumors Treatment

### Health history can affect the risk of GI neuroendocrine tumors.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop GI neuroendocrine tumors, and they can develop in people who don't have any known risk factors. Talk to your doctor if you think you may be at risk.

Risk factors for GI neuroendocrine tumors include:

- Having a family history of multiple endocrine neoplasia type 1 (MEN1) syndrome or neurofibromatosis type 1 (NF1) syndrome.
- Having certain conditions that affect the stomach's ability to make stomach acid, such as atrophic gastritis, pernicious anemia, or Zollinger-Ellison syndrome.

### Some GI neuroendocrine tumors have no signs or symptoms in the early stages.

Signs and symptoms may be caused by the growth of the tumor and/or the hormones the tumor makes. Some tumors, especially tumors of the stomach or appendix, may not cause signs or symptoms. Neuroendocrine tumors are often found during tests or treatments for other conditions.

Neuroendocrine tumors in the small intestine (duodenum, jejunum, and ileum), colon, and rectum sometimes cause signs or symptoms as they grow or because of the hormones they make. Other conditions may cause the same signs or symptoms. Check with your doctor if you have:

- Duodenum
  Signs and symptoms of GI neuroendocrine tumors in the duodenum (first part of the small intestine, that connects to the stomach) may include:
  - Abdominal pain.
  - Constipation.
  - Diarrhea.
  - Change in stool color.
  - Nausea.
  - Vomiting.
  - Jaundice (yellowing of the skin and whites of the eyes).
  - Heartburn.
- Jejunum and ileum
  Signs and symptoms of GI neuroendocrine tumors in the jejunum (middle part of the small intestine) and ileum (last part of the small intestine, that connects to the colon) may include:
  - Abdominal pain.
  - Weight loss for no known reason.
  - Feeling very tired.
  - Feeling bloated
  - Diarrhea.
  - Nausea.
  - Vomiting.
- Colon
  Signs and symptoms of GI neuroendocrine tumors in the colon may include:
  - Abdominal pain.
  - Weight loss for no known reason.
- Rectum
  Signs and symptoms of GI neuroendocrine tumors in the rectum may include:
  - Blood in the stool.
  - Pain in the rectum.
  - Constipation.

### Carcinoid syndrome may occur if the tumor spreads to the liver or other parts of the body.

The hormones made by GI neuroendocrine tumors are usually destroyed by liver enzymes in the blood. If the tumor has spread to the liver and the liver enzymes cannot destroy the extra hormones made by the tumor, high amounts of these hormones may remain in the body and cause carcinoid syndrome. This can also happen if tumor cells enter the blood. Signs and symptoms of carcinoid syndrome include:

- Redness or a feeling of warmth in the face and neck.
- Abdominal pain.
- Feeling bloated.
- Diarrhea.
- Wheezing or other trouble breathing.
- Fast heartbeat.

These signs and symptoms may be caused by GI neuroendocrine tumors or by other conditions. Talk to your doctor if you have any of these signs or symptoms.

### Imaging studies and tests that examine the blood and urine are used to diagnose GI neuroendocrine tumors.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances, such as hormones, released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease. The blood sample is checked to see if it contains a hormone produced by neuroendocrine tumors. This test is used to help diagnose carcinoid syndrome.
- Tumor marker test: A procedure in which a sample of blood, urine, or tissue is checked to measure the amounts of certain substances, such as chromogranin A, made by organs, tissues, or tumor cells in the body. Chromogranin A is a tumor marker. It has been linked to neuroendocrine tumors when found in increased levels in the body.
- Twenty-four-hour urine test: A test in which urine is collected for 24 hours to measure the amounts of certain substances, such as 5-HIAA or serotonin (hormone). An unusual (higher or lower than normal) amount of a substance can be a sign of disease in the organ or tissue that makes it. This test is used to help diagnose carcinoid syndrome.
- MIBG scan: A procedure used to find neuroendocrine tumors. A very small amount of radioactive material called MIBG (metaiodobenzylguanidine) is injected into a vein and travels through the bloodstream. Neuroendocrine tumors take up the radioactive material and are detected by a device that measures radiation.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging.
- PET scan (positron emission tomography scan): A procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells.
- Endoscopic ultrasound (EUS): A procedure in which an endoscope is inserted into the body, usually through the mouth or rectum. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal tissues or organs, such as the stomach, small intestine, colon, or rectum, and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure is also called endosonography.
- Upper endoscopy: A procedure to look at organs and tissues inside the body to check for abnormal areas. An endoscope is inserted through the mouth and passed through the esophagus into the stomach. Sometimes the endoscope also is passed from the stomach into the small intestine. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of disease.
- Colonoscopy: A procedure to look inside the rectum and colon for polyps, abnormal areas, or cancer. A colonoscope is inserted through the rectum into the colon. A colonoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove polyps or tissue samples, which are checked under a microscope for signs of cancer.
- Capsule endoscopy: A procedure used to see all of the small intestine. The patient swallows a capsule that contains a tiny camera. As the capsule moves through the gastrointestinal tract, the camera takes pictures and sends them to a receiver worn on the outside of the body.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope to check for signs of cancer. Tissue samples may be taken during endoscopy and colonoscopy.

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- Where the tumor is in the gastrointestinal tract.
- The size of the tumor.
- Whether the cancer has spread from the stomach and intestines to other parts of the body, such as the liver or lymph nodes.
- Whether the patient has carcinoid syndrome or has carcinoid heart syndrome.
- Whether the cancer can be completely removed by surgery.
- Whether the cancer is newly diagnosed or has recurred.

## Stages of Gastrointestinal Neuroendocrine Tumors

Key Points for This Section
- After a gastrointestinal neuroendocrine tumor has been diagnosed, tests are done to find out if cancer cells have spread within the stomach and intestines or to other parts of the body.
- There are three ways that cancer spreads in the body.
- Cancer may spread from where it began to other parts of the body.
- The plan for cancer treatment depends on where the neuroendocrine tumor is found and whether it can be removed by surgery.

### After a gastrointestinal neuroendocrine tumor has been diagnosed, tests are done to find out if cancer cells have spread within the stomach and intestines or to other parts of the body.

Staging is the process used to find out how far the cancer has spread. The information gathered from the staging process determines the stage of the disease. The results of tests and procedures used to diagnose gastrointestinal (GI) neuroendocrine tumors may also be used for staging. See the General Information section for a description of these tests and procedures. A bone scan may be done to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### There are three ways that cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### Cancer may spread from where it began to other parts of the body.

When cancer spreads to another part of the body, it is called metastasis. Cancer cells break away from where they began (the primary tumor) and travel through the lymph system or blood.

- Lymph system. The cancer gets into the lymph system, travels through the lymph vessels, and forms a tumor (metastatic tumor) in another part of the body.
- Blood. The cancer gets into the blood, travels through the blood vessels, and forms a tumor (metastatic tumor) in another part of the body.

The metastatic tumor is the same type of tumor as the primary tumor. For example, if a GI neuroendocrine tumor spreads to the liver, the tumor cells in the liver are actually GI neuroendocrine tumor cells. The disease is metastatic GI neuroendocrine tumor, not liver cancer.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### The plan for cancer treatment depends on where the neuroendocrine tumor is found and whether it can be removed by surgery.

For many cancers it is important to know the stage of the cancer in order to plan treatment. However, the treatment of GI neuroendocrine tumors is not based on the stage of the cancer. Treatment depends mainly on whether the tumor can be removed by surgery and if the tumor has spread.

Treatment is based on whether the tumor:

- Can be completely removed by surgery.
- Has spread to other parts of the body.
- Has come back after treatment. The tumor may come back in the stomach or intestines or in other parts of the body.
- Has not gotten better with treatment.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with gastrointestinal neuroendocrine tumors.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
  - Hormone therapy
- Treatment for carcinoid syndrome may also be needed.
- New types of treatment are being tested in clinical trials.
- Treatment for gastrointestinal neuroendocrine tumors may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up care may be needed.

### There are different types of treatment for patients with gastrointestinal neuroendocrine tumors.

Different types of treatment are available for patients with gastrointestinal neuroendocrine (GI) tumors. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

### The following types of treatment are used:

#### Surgery

Treatment of GI neuroendocrine tumors usually includes surgery. One of the following surgical procedures may be used:

- Endoscopic resection: Surgery to remove a small tumor that is on the inside lining of the GI tract. An endoscope is inserted through the mouth and passed through the esophagus to the stomach and sometimes, the duodenum. An endoscope is a thin, tube-like instrument with a light, a lens for viewing, and a tool for removing tumor tissue.
- Local excision: Surgery to remove the tumor and a small amount of normal tissue around it.
- Resection: Surgery to remove part or all of the organ that contains cancer. Nearby lymph nodes may also be removed.
- Cryosurgery: A treatment that uses an instrument to freeze and destroy the tumor. This type of treatment is also called cryotherapy. The doctor may use ultrasound to guide the instrument.
- Radiofrequency ablation: The use of a special probe with tiny electrodes that release high-energy radio waves (similar to microwaves) that kill cancer cells. The probe may be inserted through the skin or through an incision (cut) in the abdomen.
- Liver transplant: Surgery to remove the whole liver and replace it with a healthy donated liver.
- Hepatic artery embolization: A procedure to embolize (block) the hepatic artery, which is the main blood vessel that brings blood into the liver. Blocking the flow of blood to the liver helps kill cancer cells growing there.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are two types of radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

Radiopharmaceutical therapy is a type of internal radiation therapy. Radiation is given to the tumor using a drug that has a radioactive substance, such as iodine I 131, attached to it. The radioactive substance kills the tumor cells.

External and internal radiation therapy are used to treat GI neuroendocrine tumors that have spread to other parts of the body.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping the cells from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). When chemotherapy is placed directly into the cerebrospinal fluid, an organ, or a body cavity such as the abdomen, the drugs mainly affect cancer cells in those areas (regional chemotherapy).

Chemoembolization of the hepatic artery is a type of regional chemotherapy that may be used to treat a GI neuroendocrine tumor that has spread to the liver. The anticancer drug is injected into the hepatic artery through a catheter (thin tube). The drug is mixed with a substance that embolizes (blocks) the artery and cuts off blood flow to the tumor. Most of the anticancer drug is trapped near the tumor and only a small amount of the drug reaches other parts of the body. The blockage may be temporary or permanent, depending on the substance used to block the artery. The tumor is prevented from getting the oxygen and nutrients it needs to grow. The liver continues to receive blood from the hepatic portal vein, which carries blood from the stomach and intestine.

The way the chemotherapy is given depends on the type and stage of the cancer being treated.

#### Hormone therapy

Hormone therapy with a somatostatin analog is a treatment that stops extra hormones from being made. GI neuroendocrine tumors are treated with octreotide or lanreotide which are injected under the skin or into the muscle. Octreotide and lanreotide may also have a small effect on stopping tumor growth.

### Treatment for carcinoid syndrome may also be needed.

Treatment of carcinoid syndrome may include:

- Hormone therapy with a somatostatin analog stops extra hormones from being made. Carcinoid syndrome is treated with octreotide or lanreotide to lessen flushing and diarrhea. Octreotide and lanreotide may also help slow tumor growth.
- Interferon therapy stimulates the body's immune system to work better and lessens flushing and diarrhea. Interferon may also help slow tumor growth.
- Taking medicine for diarrhea.
- Taking medicine for skin rashes.
- Taking medicine to breathe easier.
- Taking medicine before having anesthesia for a medical procedure.

Other ways to help treat carcinoid syndrome include avoiding things that cause flushing or difficulty breathing such as alcohol, nuts, certain cheeses and foods with capsaicin, such as chili peppers. Avoiding stressful situations and certain types of physical activity can also help treat carcinoid syndrome.

For some patients with carcinoid heart syndrome, a heart valve replacement may be done.

### New types of treatment are being tested in clinical trials.

This summary section describes treatments that are being studied in clinical trials. It may not mention every new treatment being studied. Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Several types of targeted therapy are being studied in the treatment of GI neuroendocrine tumors.

### Treatment for gastrointestinal neuroendocrine tumors may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Neuroendocrine Tumors in the Stomach

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of gastrointestinal (GI) neuroendocrine tumors in the stomach may include:

- Endoscopic surgery (resection) for small tumors.
- Surgery (resection) to remove part or all of the stomach. Nearby lymph nodes for larger tumors, tumors that grow deep into the stomach wall, or tumors that are growing and spreading quickly may also be removed.

For patients with GI neuroendocrine tumors in the stomach and MEN1 syndrome, treatment may also include:

- Surgery (resection) to remove tumors in the duodenum (first part of the small intestine, that connects to the stomach).
- Hormone therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Neuroendocrine Tumors in the Small Intestine

For information about the treatments listed below, see the Treatment Option Overview section.

It is not clear what the best treatment is for gastrointestinal (GI) neuroendocrine tumors in the duodenum (first part of the small intestine, that connects to the stomach). Treatment may include:

- Endoscopic surgery (resection) for small tumors.
- Surgery (local excision) to remove slightly larger tumors.
- Surgery (resection) to remove the tumor and nearby lymph nodes.

Treatment of GI neuroendocrine tumors in the jejunum (middle part of the small intestine) and ileum (last part of the small intestine, that connects to the colon) may include:

- Surgery (resection) to remove the tumor and the membrane that connects the intestines to the back of the abdominal wall. Nearby lymph nodes are also removed.
- A second surgery to remove the membrane that connects the intestines to the back of the abdominal wall, if any tumor remains or the tumor continues to grow.
- Hormone therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Neuroendocrine Tumors in the Appendix

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of gastrointestinal (GI) neuroendocrine tumors in the appendix may include:

- Surgery (resection) to remove the appendix.
- Surgery (resection) to remove the right side of the colon including the appendix. Nearby lymph nodes are also removed.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Neuroendocrine Tumors in the Colon

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of gastrointestinal (GI) neuroendocrine tumors in the colon may include:

- Surgery (resection) to remove part of the colon and nearby lymph nodes, in order to remove as much of the cancer as possible.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Neuroendocrine Tumors in the Rectum

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of gastrointestinal (GI) neuroendocrine tumors in the rectum may include:

- Endoscopic surgery (resection) for tumors that are smaller than 1 centimeter.
- Surgery (resection) for tumors that are larger than 2 centimeters or that have spread to the muscle layer of the rectal wall. This may be either:
  - surgery to remove part of the rectum; or
  - surgery to remove the anus, the rectum, and part of the colon through an incision made in the abdomen.

It is not clear what the best treatment is for tumors that are 1 to 2 centimeters. Treatment may include:

- Endoscopic surgery (resection).
- Surgery (resection) to remove part of the rectum.
- Surgery (resection) to remove the anus, the rectum, and part of the colon through an incision made in the abdomen.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Metastatic Gastrointestinal Neuroendocrine Tumors

For information about the treatments listed below, see the Treatment Option Overview section.

Distant metastases

Treatment of distant metastases of gastrointestinal (GI) neuroendocrine tumors is usually palliative therapy to relieve symptoms and improve quality of life. Treatment may include:

- Surgery (resection) to remove as much of the tumor as possible.
- Hormone therapy.
- Radiopharmaceutical therapy.
- External radiation therapy for cancer that has spread to the bone, brain, or spinal cord.
- A clinical trial of a new treatment.

Liver metastases

Treatment of cancer that has spread to the liver may include:

- Surgery (local excision) to remove the tumor from the liver.
- Hepatic artery embolization.
- Cryosurgery.
- Radiofrequency ablation.
- Liver transplant.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Gastrointestinal Neuroendocrine Tumors

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of recurrent gastrointestinal (GI) neuroendocrine tumors may include:

- Surgery (local excision) to remove part or all of the tumor.
- A clinical trial of a new treatment.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Gastrointestinal Neuroendocrine Tumors

For more information from the National Cancer Institute about gastrointestinal neuroendocrine tumors, see:

- Gastrointestinal Neuroendocrine Tumors Home Page (https://www.cancer.gov/types/gi-carcinoid-tumors/)
- Cryosurgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/cryosurgery)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of adult gastrointestinal neuroendocrine tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Gastrointestinal Neuroendocrine Tumors Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/gi-neuroendocrine-tumors/patient/gi-neuroendocrine-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389212]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).